# Prostate Cancer, Nutrition, and Dietary Supplements (PDQ®)

Patient Version

This PDQ cancer information summary has current information about the use of nutrition and dietary supplements for reducing the risk of developing prostate cancer or for treating prostate cancer. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Integrative, Alternative, and Complementary Therapies Editorial Board.

## Introduction

Complementary and alternative medicine (CAM) is a form of treatment used in addition to (complementary) or instead of (alternative) standard treatments.

In the United States, about 1 out of every 8 men will be diagnosed with prostate cancer. It is the second most common cancer in men in the United States. CAM use among men with prostate cancer is common. Studies of why men with prostate cancer decide to use CAM show that their choice is based on medical history, beliefs about the safety and side effects of CAM compared to standard treatments, and a need to feel in control of their treatment.

CAM treatments used by men with prostate cancer include certain foods, dietary supplements, herbs, vitamins, and minerals.

Different types of studies have been done to study the use of CAM in prostate cancer. These study types include:

- Combined study: A combined study analyzes data from more than one study done on the same topic, such as the response to a dietary supplement, risk of getting cancer, or treatment of cancer. The results of a combined study are usually stronger than the results of any study by itself. A combined study is also called a meta-analysis.
- Population study: A population study looks at a group of people who are part of the general population and share a common characteristic, such as age, sex, or health condition. This group of people may be studied for different reasons, such as their response to a dietary supplement or risk of getting cancer. A population study is also called an epidemiologic study.
- Clinical trial: A clinical trial looks at how well new medical approaches work in people. These studies may test new methods of screening, prevention, diagnosis, or treatment of cancer. Clinical trials with a small number of people or when the treatment is not randomly assigned are not included in this summary. See the clinical trial sections of the health professional version of Prostate Cancer, Nutrition, and Dietary Supplements for information on clinical trials done using nutrients or supplements.
- Laboratory and animal studies: In laboratory studies, a substance is tested in tumor cells to find out if it has any anticancer effects. In animal studies, a drug, procedure, or treatment is tested in mice or other animals to see if it is safe and effective. Laboratory and animal studies are done before a substance is tested in people.

CAM treatments have been studied to see if their use lowers the risk of prostate cancer, kills prostate cancer cells, or lowers the risk that cancer will come back after treatment. Most of these studies used prostate-specific antigen (PSA) levels to find out whether the treatment worked. This is a weaker measure of how well the treatment works than direct measures, such as fewer new cases of prostate cancer, or smaller tumor size or lower rate of recurrence after treatment for prostate cancer.

This PDQ summary has sections about the use of specific foods and dietary supplements to prevent or treat prostate cancer:

- Calcium
- Green Tea
- Lycopene
- Modified Citrus Pectin
- Pomegranate
- Selenium
- Soy
- Vitamin D
- Vitamin E
- Combination Therapies
- Other Prostate Health Supplements

Each section includes the following information for each food or dietary supplement:

- How it is given or taken.
- Results of studies done in people.
- Side effects or risks.
- Food and Drug Administration (FDA) information.

## Overview of CAM Use in Prostate Cancer

Studies of CAM use to treat prostate cancer have shown the following:

- Men who have prostate cancer are more likely to take dietary supplements and eat certain foods than men who do not have prostate cancer.
- Men who have prostate cancer and who have healthy eating habits (for example, eating lots of fish rich in omega-3 fatty acids and vegetables) are more likely to take dietary supplements.
- Men who have prostate cancer use CAM treatments to help boost the immune system, improve quality of life, and lower the risk of the cancer coming back, but only half of them tell their doctors about their use of CAM.

Studies of CAM use to lower prostate cancer risk or to prevent it from coming back have shown the following:

- A study of men with a family history of prostate cancer found that over half used vitamins or other dietary supplements for prostate health or to prevent cancer.
- A study of men at a prostate cancer screening clinic found that over half took multivitamins and some took herbal supplements.
- A study of prostate cancer survivors found that up to one-third took vitamins or minerals.

For more information, see Prostate Cancer Prevention.

## Calcium: Questions and Answers

1. What is calcium?
  Calcium is a common mineral in the body that helps blood vessels, muscles, and nerves send signals from cell to cell and release hormones. The body stores most calcium in bones and teeth.
2. How is calcium given or taken?
  The main sources of calcium are in foods and dietary supplements. About one-third of dietary calcium comes from milk and milk products like cheese and yogurt. Vegetable sources include bok choy, kale, and broccoli. Calcium is sometimes added to foods and drinks, such as fruit juices, tofu, and cereals.
  Most research about calcium and prostate cancer risk has studied calcium in the diet, not calcium in supplements.
3. Have any laboratory or animal studies been done using calcium?
  For information on laboratory and animal studies done using calcium, see the Laboratory/Animal/Preclinical Studies section of the health professional version of Prostate Cancer, Nutrition, and Dietary Supplements.
4. Have any studies of calcium been done in people?
  Studies of people in many parts of the world have been done to find out if there is a link between dairy products, calcium supplements, and prostate cancer risk. The results of these studies have been mixed. Some studies have shown that calcium has an effect on the overall risk of developing prostate cancer or on stopping cancer from coming back after treatment, and others have not.
  For information on studies in people taking calcium supplements, dairy products, or non-dairy calcium products, see the Human Studies section of the health professional version of Prostate Cancer, Nutrition, and Dietary Supplements.
5. Is calcium approved by the FDA for use as a cancer treatment in the United States?
  The FDA has not approved the use of calcium as a treatment for cancer.
  The FDA regulates dietary supplements separately from foods, cosmetics, and drugs. The FDA's Good Manufacturing Practices require that every finished batch of supplements is safe and that the claims on the label are true and do not mislead the consumer. However, the FDA does not regularly review the way that supplements are made, so all batches and brands of calcium supplements may not be the same.

### Current Clinical Trials

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## Green Tea: Questions and Answers

1. What is green tea?
  Tea comes from the Camellia sinensis plant. The way tea leaves are processed determines whether green tea, black tea, or oolong tea is made. Green tea is made by steaming and drying the leaves.
  The health benefits studied in green tea are thought to be from compounds called polyphenols. Polyphenols are a group of plant chemicals that include catechins (antioxidants that help protect cells from damage). Catechins make up most of the polyphenols in green tea and vary based on the source of the tea leaves and how they are processed. This makes it hard to identify most of the chemical factors linked to the health benefits of green tea.
  Some studies suggest that green tea may protect against heart and blood vessel disease.
2. How is green tea given or taken?
  People usually drink green tea or take it as a dietary supplement.
3. Have any laboratory or animal studies been done using green tea?
  For information on laboratory and animal studies done using green tea, see the Laboratory/Animal/Preclinical Studies section of the health professional version of Prostate Cancer, Nutrition, and Dietary Supplements.
4. Have any studies of green tea been done in people?
  Population studies and clinical trials have been done to find out if green tea can prevent or treat prostate cancer. Results have been mixed. Some studies have shown a short-term decrease in prostate-specific antigen (PSA) level or a lower risk of having prostate cancer, and others have not. There is not enough evidence to know whether green tea can prevent or treat prostate cancer.
  Overall, population studies suggest that green tea may help protect against prostate cancer in Asian populations. Prostate cancer deaths in Asia are among the lowest in the world. Other populations have not been studied.
  For information on studies in people drinking green tea or taking green tea supplements, see the Human Studies section of the health professional version of Prostate Cancer, Nutrition, and Dietary Supplements.
5. Have any side effects or risks been reported from green tea?
  A trial of oral green tea extract in patients with solid tumors reported that drinking 7 to 8 Japanese-style cups (equal to 3 ½ to 4 US cups) of tea 3 times a day for 6 months was a safe dose.
  Clinical trials have reported on the safety of long-term use of green tea to prevent prostate cancer. In a United States trial, men at risk of prostate cancer were given green tea extract or a placebo for 1 year. There were more side effects in the group who received the green tea extract than in the group who received the placebo.
  In safety studies of green tea for men with prostate cancer, short-term green tea use for up to 90 days was well tolerated. One study found that the most reported side effects of green tea were headache, chest pain, or gastrointestinal symptoms, such as nausea and diarrhea. These were mild except for two reports of trouble breathing and severe anorexia. In men with advanced prostate cancer, side effects of green tea included insomnia, confusion, and fatigue. In rare cases, liver problems have occurred.
6. Is green tea approved by the FDA for use as a cancer treatment in the United States?
  The FDA has not approved the use of green tea as a treatment for cancer or any other medical condition.
  The FDA Division of Drug Oncology Products recommends that green tea extract be taken with food by participants in clinical trials and that frequent liver function tests be considered during treatment, especially in the first few months of starting a clinical trial.
  Green tea is available in the United States in food products and dietary supplements. The FDA regulates dietary supplements separately from foods, cosmetics, and drugs. The FDA's Good Manufacturing Practices require that every finished batch of supplements is safe and that the claims on the label are true and do not mislead the consumer. However, the FDA does not regularly review the way that supplements are made, so all batches and brands of green tea supplements may not be the same.

### Current Clinical Trials

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## Lycopene: Questions and Answers

1. What is lycopene?
  Lycopene is a carotenoid (a natural red color made by plants). It mixes with or dissolves in fats. Lycopene protects plants from light-related stress and helps them use the energy of the sun to make nutrients. Lycopene is found in fruits and vegetables like tomatoes, apricots, guavas, and watermelons.
  The main source of lycopene in the United States is tomato-based products. Lycopene is easier for the body to use when it is eaten in processed tomato products like tomato paste and tomato puree than in raw tomatoes.
  Lycopene has been studied for its role in the prevention of heart and blood vessel disease.
2. How is lycopene given or taken?
  Lycopene may be eaten in food or taken in dietary supplements.
3. Have any laboratory or animal studies been done using lycopene?
  For information on laboratory and animal studies done using lycopene, see the Laboratory/Animal/Preclinical Studies section of the health professional version of Prostate Cancer, Nutrition, and Dietary Supplements.
4. Have any studies of lycopene been done in people?
  Population studies and clinical trials have been done to find out if lycopene can prevent or treat prostate cancer. Some studies have shown a lower risk of prostate cancer or a decrease in prostate-specific antigen (PSA) level, and others have not. These mixed results may be explained by differences within the studies, such as the sources and types of lycopene studied, the diets of the participants, and differences in participants' prostate cancer risk factors (e.g., genetics, obesity, and tobacco and alcohol use). Also, most research has studied the effects of lycopene on the risk of all prostate cancers, and has not studied effects of lycopene on low-grade prostate cancer compared with high-grade prostate cancer. There is not enough evidence to know whether lycopene can prevent or treat prostate cancer.
  For information on studies in people taking lycopene supplements or foods containing lycopene, see the Human Studies section of the health professional version of Prostate Cancer, Nutrition, and Dietary Supplements.
  For information on trials of combination therapies that include lycopene, see the Combination Therapies section of this summary.
5. Have any side effects or risks been reported from lycopene?
  Lycopene has been given in many clinical trials with very few side effects. Side effects, such as diarrhea, nausea and vomiting, bloating, increased gas, and stomach irritation have been reported. In one study, symptoms went away when lycopene was taken with meals.
6. Is lycopene approved by the FDA for use to prevent or treat cancer in the United States?
  The FDA has not approved the use of lycopene as a treatment for cancer or any other medical condition.
  Lycopene is available in the United States in food products and dietary supplements. The FDA regulates dietary supplements separately from foods, cosmetics, and drugs. The FDA's Good Manufacturing Practices require that every finished batch of supplements is safe and that the claims on the label are true and do not mislead the consumer. However, the FDA does not regularly review the way that supplements are made, so all batches and brands of lycopene supplements may not be the same.

### Current Clinical Trials

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## Modified Citrus Pectin: Questions and Answers

1. What is modified citrus pectin?
  Pectin is a substance made of small sugar molecules that are linked together. Pectin is found in the cell wall of most plants and has gel-like qualities that are useful in making many types of food and medicine.
  Citrus pectin is found in the peel and pulp of citrus fruits such as oranges, grapefruit, lemons, and limes. Citrus pectin can be modified (changed) during manufacturing so that it can be dissolved in water and absorbed by the body. This changed citrus pectin is called modified citrus pectin (MCP).
2. How is MCP given or taken?
  MCP may be taken by mouth in powder or capsule form.
3. Have any laboratory or animal studies been done using MCP?
  For information on laboratory and animal studies done using MCP, see the Laboratory/Animal/Preclinical Studies section of the health professional version of Prostate Cancer, Nutrition, and Dietary Supplements.
4. Have any studies of MCP been done in people?
  Few studies have been done in men with prostate cancer. There is not enough evidence to know whether MCP has any effect on prostate cancer.
5. Have any side effects or risks been reported from MCP?
  Side effects that have been reported include itching, upset stomach, abdominal cramps, increased gas, and diarrhea.
6. Is MCP approved by the FDA for use to prevent or treat cancer in the United States?
  The FDA has not approved the use of MCP as a treatment for cancer or any other medical condition.
  MCP is available in the United States in food products and dietary supplements. The FDA regulates dietary supplements separately from foods, cosmetics, and drugs. The FDA's Good Manufacturing Practices require that every finished batch of supplements is safe and that the claims on the label are true and do not mislead the consumer. However, the FDA does not regularly review the way that supplements are made, so all batches and brands of MCP supplements may not be the same.

### Current Clinical Trials

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## Pomegranate: Questions and Answers

1. What is pomegranate?
  The pomegranate is a fruit grown in Asia and in the Mediterranean, East Indies, Africa, and the United States. Pomegranate has been used as medicine for hundreds of years.
  The pomegranate is made up of the following:
  - The peel, which makes up half the fruit and contains polyphenols and minerals.
  - The seeds.
  - The aril (the layer between the peel and the seeds), which contains phenolics and flavonoids including anthocyanins, which give the pomegranate fruit and juice a red color.
2. How is pomegranate given or taken?
  Pomegranate fruit and juice may be taken as food, drink, or a dietary supplement.
3. Have any laboratory or animal studies been done using pomegranate?
  For information on laboratory and animal studies done using pomegranate, see the Laboratory/Animal/Preclinical Studies section of the health professional version of Prostate Cancer, Nutrition, and Dietary Supplements.
4. Have any studies of pomegranate been done in people?
  In a 2015 study, 183 men with recurrent prostate cancer were randomly assigned to receive either pomegranate juice, pomegranate extract, or a placebo. The study found no difference in how fast the prostate-specific antigen (PSA) level rose between the 3 groups. There is not enough evidence to know whether pomegranate can prevent or treat prostate cancer.
5. Have any side effects or risks been reported from pomegranate?
  No serious side effects have been reported from the use of pomegranate.
6. Is pomegranate approved by the FDA for use to prevent or treat cancer in the United States?
  The FDA has not approved the use of pomegranate as a treatment for cancer or any other medical condition.
  Pomegranate is available in the United States in food products and dietary supplements. The FDA regulates dietary supplements separately from foods, cosmetics, and drugs. The FDA's Good Manufacturing Practices require that every finished batch of supplements is safe and that the claims on the label are true and do not mislead the consumer. However, the FDA does not regularly review the way that supplements are made, so all batches and brands of pomegranate supplements may not be the same.

### Current Clinical Trials

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## Selenium: Questions and Answers

1. What is selenium?
  Selenium is a mineral that is essential to people in tiny amounts. Selenium is needed for many body functions, including reproduction and immunity. Food sources of selenium include meat, vegetables, and nuts. The amount of selenium found in the food depends on the amount of selenium in the soil where the food grows. Selenium is stored in the thyroid gland, liver, pancreas, pituitary gland, and kidneys.
  Selenium may play a role in many diseases, including cancer. Results of the large National Cancer Institute-sponsored Selenium and Vitamin E Cancer Prevention Trial (SELECT) suggest that men with prostate cancer should not take selenium supplements.
2. How is selenium given or taken?
  Selenium may be eaten in food or taken in dietary supplements.
3. Have any laboratory or animal studies been done using selenium?
  For information on laboratory and animal studies done using selenium, see the Laboratory/Animal/Preclinical Studies section of the health professional version of Prostate Cancer, Nutrition, and Dietary Supplements.
4. Have any studies of selenium been done in people?
  Population studies and clinical trials have been done to find out if selenium can prevent or treat prostate cancer. The results of these studies have been mixed, but the results of a large, randomized clinical trial showed selenium had no effect on preventing prostate cancer.
  For information on studies in people taking selenium, see the Human Studies section of the health professional version of Prostate Cancer, Nutrition, and Dietary Supplements.
5. Have any side effects or risks of selenium supplements been reported?
  Selenium supplements have been well tolerated in many clinical trials. But, in the Selenium and Vitamin E Cancer Prevention Trial, the use of selenium supplements was linked with a slight increase in the rate of diabetes mellitus.
  In several large studies, men with high selenium levels were at greater risk of being diagnosed with aggressive prostate cancer or dying from prostate cancer.
6. Is selenium approved by the FDA for use as a cancer treatment in the United States?
  The FDA has not approved the use of selenium supplements for the treatment or prevention of cancer.
  Selenium is available in the United States in food products and dietary supplements. The FDA regulates dietary supplements separately from foods, cosmetics, and drugs. The FDA's Good Manufacturing Practices require that every finished batch of supplements is safe and that the claims on the label are true and do not mislead the consumer. However, the FDA does not regularly review the way that supplements are made, so all batches and brands of selenium supplements may not be the same.

### Current Clinical Trials

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## Soy: Questions and Answers

1. What is soy?
  The soybean plant has been grown in Asia for food for hundreds of years. Soybeans are used to make soy milk, miso, tofu, soy flour, oil, and other food products.
  Soy foods contain phytochemicals that may have health benefits. Isoflavones are the most widely studied compounds in soy. Major isoflavones in the soybean include genistein, daidzein, and glycitein.
  Isoflavones are phytoestrogens (estrogen-like substances found in plants) that attach to estrogen receptors found in prostate cancer cells. Genistein may affect some processes inside prostate cancer cells that are involved in the growth and spread of cancer.
2. How is soy given or taken?
  Soy may be eaten in food or taken in dietary supplements.
3. Have any laboratory or animal studies been done using soy?
  For information on laboratory and animal studies done using soy, see the Laboratory/Animal/Preclinical Studies section of the health professional version of Prostate Cancer, Nutrition, and Dietary Supplements.
4. Have any studies of soy been done in people?
  Population studies and clinical trials have been done to find out if soy can prevent or treat prostate cancer. The results of these studies have been mixed. Some studies have shown a lower risk of prostate cancer or a change in prostate-specific antigen (PSA) level, and others have not. The results may be mixed because of the small number of men who participated in the studies and the different types and doses of soy products given.
  Small randomized clinical trials have been done to study the effects of isoflavones or soy on prostate cancer. The results of these studies have been mixed. See Table 3, Table 4, and Table 5 of the health professional version of Prostate Cancer, Nutrition, and Dietary Supplements for information on randomized, placebo-controlled clinical trials of isoflavones and soy.
  For more information on studies in people taking soy supplements, soy products, or soy found in foods, see the Human Studies section of the health professional version of Prostate Cancer, Nutrition, and Dietary Supplements.
5. Have any side effects or risks been reported from soy?
  Soy products and isoflavones have caused very few side effects in people with prostate cancer who participated in clinical trials. The most commonly reported side effects were gastrointestinal symptoms, such as diarrhea.
6. Is soy approved by the FDA for use to prevent or treat cancer in the United States?
  The FDA has not approved the use of soy as a treatment for cancer or any other medical condition.
  Soy is available in the United States in food products and dietary supplements. The FDA regulates dietary supplements separately from foods, cosmetics, and drugs. The FDA's Good Manufacturing Practices require that every finished batch of supplements is safe and that the claims on the label are true and do not mislead the consumer. However, the FDA does not regularly review the way that supplements are made, so all batches and brands of soy supplements may not be the same.

### Current Clinical Trials

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## Vitamin D: Questions and Answers

1. What is vitamin D?
  Vitamin D is a fat-soluble vitamin found in fatty fish, fish liver oil, and eggs. Vitamin D may also be added to dairy products. Vitamin D:
  - Helps absorb calcium from food in the small intestine.
  - Improves muscle strength and immune system function.
  - Lowers inflammation.
  - Maintains levels of calcium and phosphate in the blood.
  - Helps with bone growth and protects against osteoporosis in adults.
  A person's vitamin D level is checked by measuring the amount of 25-hydroxyvitamin D in the blood.
2. How is vitamin D given or taken?
  Vitamin D is made by the body when exposed to sunlight. Vitamin D may also be eaten in food or taken in dietary supplements.
3. Have any laboratory or animal studies been done using vitamin D?
  For information on laboratory and animal studies done using vitamin D, see the Laboratory/Animal/Preclinical Studies section of the health professional version of Prostate Cancer, Nutrition, and Dietary Supplements.
4. Have any studies of vitamin D been done in people?
  Population studies and clinical trials have been done to study the effects of vitamin D on prostate cancer. The results of these studies have been mixed. Some studies have shown a link between Vitamin D levels and prostate cancer, and others have not. There is not enough evidence to know whether vitamin D can prevent prostate cancer.
  Studies often look at specific factors that affect a person's vitamin D levels to see how those factors influence prostate cancer risk. Factors that have been studied include:
  - Low sun exposure.
  - Levels of vitamin D in the diet and blood.
  - Genetic changes.
  Some genetic changes in tumor features that interact with vitamin D might affect the growth and spread of prostate cancer. One of those features is a molecule called a vitamin D receptor. Studies suggest that changes in this receptor could influence a person's risk of prostate cancer or increase the chance that the cancer will spread. More research is needed to confirm that vitamin D receptors play a role in prostate cancer.
  For information on studies in people taking vitamin D supplements, vitamin D products, or vitamin D in food, see the Human Studies section of the health professional version of Prostate Cancer, Nutrition, and Dietary Supplements.
5. Have any side effects or risks been reported from vitamin D?
  Vitamin D can cause serious health problems when taken at high doses over many years. Taking high levels of Vitamin D can cause too much calcium to be absorbed in the intestines, leading to rapid increases in blood calcium levels. This condition is called hypercalcemia.
  In a group of 26 studies, Vitamin D was reviewed for safety, how well it works, and whether it interacts with drugs used to treat prostate cancer and other tumors. The reviewers found the risk of side effects and interactions with other drugs to be low.
  Several studies looked at the safety of high-dose vitamin D and how well it works with chemotherapy (docetaxel) to treat men with prostate cancer that did not respond to hormone therapy. The side effects that occurred after treatment with high-dose vitamin D and docetaxel were the same as the side effects noted after treatment with docetaxel alone.
6. Is vitamin D approved by the FDA for use as a cancer treatment in the United States?
  The FDA has not approved the use of vitamin D as a treatment for cancer.
  Vitamin D is available in the United States in food products and dietary supplements. The FDA regulates dietary supplements separately from foods, cosmetics, and drugs. The FDA's Good Manufacturing Practices require that every finished batch of supplements is safe and that the claims on the label are true and do not mislead the consumer. However, the FDA does not regularly review the way that supplements are made, so all batches and brands of vitamin D supplements may not be the same.

### Current Clinical Trials

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## Vitamin E: Questions and Answers

1. What is vitamin E?
  Vitamin E is an antioxidant that may help protect cells from damage. Vitamin E also affects how signals are sent within cells and how the cell makes RNA and proteins.
  There are eight forms of vitamin E: four tocopherols (alpha-, beta-, gamma-, and sigma-) and four tocotrienols (alpha-, beta-, gamma-, and sigma-). Alpha-tocopherol, the form of vitamin E used in dietary supplements, is found in greater amounts in the body and is the most active form of vitamin E. Most vitamin E in the diet comes from gamma-tocopherol. Food sources of vitamin E include vegetable oils, nuts, and egg yolks.
  Vitamin E may protect against chronic diseases, such as heart and blood vessel disease.
2. How is vitamin E given or taken?
  Vitamin E may be eaten in food or taken in dietary supplements.
3. Have any studies of vitamin E been done in people?
  Population studies and clinical trials have been done to find out if vitamin E may prevent prostate cancer. The results of these studies have been mixed. Some studies have shown no change in the overall risk of prostate cancer, and others have shown an increased risk of prostate cancer. There is not enough evidence to know whether vitamin E affects the risk of prostate cancer.
  For information on studies in people taking vitamin E supplements, vitamin E products, or vitamin E in food, see the Human Studies section of the health professional version of Prostate Cancer, Nutrition, and Dietary Supplements.
4. Have any side effects or risks been reported from vitamin E?
  In the Physicians' Health Study II and the Alpha-Tocopherol, Beta Carotene Cancer Prevention Study Group, there was a higher number of strokes caused by a broken blood vessel in the brain in men who took vitamin E than in men who took a placebo.
5. Is vitamin E approved by the FDA for use as a cancer treatment in the United States?
  The FDA has not approved the use of vitamin E as a treatment for cancer.
  Vitamin E is available in the United States in food products and dietary supplements. The FDA regulates dietary supplements separately from foods, cosmetics, and drugs. The FDA's Good Manufacturing Practices require that every finished batch of supplements is safe and that the claims on the label are true and do not mislead the consumer. However, the FDA does not regularly review the way that supplements are made, so all batches and brands of vitamin E supplements may not be the same.

### Current Clinical Trials

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## Combination Therapies

### Pomi-T (Pomegranate, Green Tea, Broccoli, and Turmeric)

Polyphenols are found in many plants and give some flowers, fruits, and vegetables their color. Polyphenols have antioxidant activity that may help protect cells from damage.

A food supplement that is high in polyphenols was studied in a group of men who had prostate cancer that had not spread. This supplement contained the following:

- Pomegranate whole fruit powder.
- Green tea extract.
- Broccoli powder.
- Turmeric powder.

One hundred and ninety-nine men were randomly assigned to receive either the food supplement or a placebo for 6 months. The food supplement was well tolerated. However, men in the supplement group were more likely to have gastrointestinal symptoms, such as increased gas and loose bowels.

### Lycopene, Selenium, and Green Tea

A dietary supplement was studied in 60 men at high risk of prostate cancer (high-grade prostatic intraepithelial neoplasia). The supplement contained the following:

- Lycopene.
- Selenium.
- Green tea catechins.

The men were randomly assigned to receive the supplement or a placebo. Men who took the supplement for 6 months had higher rates of prostate cancer when they had a repeat biopsy than men who did not take the supplement. This result may be due to cancers missed at the start of the study.

### Lycopene and Other Therapies

A study enrolled 79 men who were scheduled to have a prostatectomy. For 3 weeks before surgery, the men were assigned to eat or drink either:

- Tomato products containing lycopene.
- Tomato products plus selenium, omega 3-fatty acids, soy isoflavones, grape/pomegranate juice, and green/black tea.
- A diet without added nutrients.

The prostate-specific antigen (PSA) levels were the same for men who received added nutrients and those who did not. However, among men with intermediate-risk prostate cancer, lower PSA levels were found in those who ate the tomato products or had the highest increases in lycopene levels.

### Zyflamend

Zyflamend is a dietary supplement that contains extracts of 10 different herbs in olive oil:

- Rosemary.
- Turmeric.
- Ginger.
- Holy basil.
- Green tea.
- Hu zhang (Polygonum cuspidatum).
- Chinese goldthread.
- Barberry.
- Oregano.
- Baikal skullcap.

The herb extracts used in Zyflamend may have anti-inflammatory activity. There is not enough evidence to know whether Zyflamend can prevent or treat prostate cancer.

Zyflamend is taken as a dietary supplement in capsule form.

No serious side effects have been reported for Zyflamend. In one study, some men had mild heartburn that went away when Zyflamend was taken with food.

## Other Prostate Health Supplements

### Overview

African cherry (pygeum africanum) and beta-sitosterol are two supplements that have been studied for general prostate health and the treatment of benign prostatic hyperplasia (BPH) and prostate cancer. For more information, see the African cherry (pygeum africanum) and beta-sitosterol sections of the health professional version of Prostate Cancer, Nutrition, and Dietary Supplements.

## About This PDQ Summary

### About PDQ

Physician Data Query (PDQ) is the National Cancer Institute's (NCI's) comprehensive cancer information database. The PDQ database contains summaries of the latest published information on cancer prevention, detection, genetics, treatment, supportive care, and complementary and alternative medicine. Most summaries come in two versions. The health professional versions have detailed information written in technical language. The patient versions are written in easy-to-understand, nontechnical language. Both versions have cancer information that is accurate and up to date and most versions are also available in Spanish (https://www.cancer.gov/espanol/publicaciones/pdq).

PDQ is a service of the NCI. The NCI is part of the National Institutes of Health (NIH). NIH is the federal government’s center of biomedical research. The PDQ summaries are based on an independent review of the medical literature. They are not policy statements of the NCI or the NIH.

### Purpose of This Summary

This PDQ cancer information summary has current information about the use of nutrition and dietary supplements for reducing the risk of developing prostate cancer or for treating prostate cancer. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

### Reviewers and Updates

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Updated") is the date of the most recent change.

The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Integrative, Alternative, and Complementary Therapies Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/cam).

### Clinical Trial Information

A clinical trial is a study to answer a scientific question, such as whether one treatment is better than another. Trials are based on past studies and what has been learned in the laboratory. Each trial answers certain scientific questions in order to find new and better ways to help cancer patients. During treatment clinical trials, information is collected about the effects of a new treatment and how well it works. If a clinical trial shows that a new treatment is better than one currently being used, the new treatment may become "standard." Patients may want to think about taking part in a clinical trial. Some clinical trials are open only to patients who have not started treatment.

Clinical trials can be found online at NCI's website (https://www.cancer.gov/research/participate/clinical-trials). For more information, call the Cancer Information Service (https://www.cancer.gov/contact/contact-center) (CIS), NCI's contact center, at 1-800-4-CANCER (1-800-422-6237).

### Permission to Use This Summary

PDQ is a registered trademark. The content of PDQ documents can be used freely as text. It cannot be identified as an NCI PDQ cancer information summary unless the whole summary is shown and it is updated regularly. However, a user would be allowed to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks in the following way: [include excerpt from the summary].”

The best way to cite this PDQ summary is:

PDQ® Integrative, Alternative, and Complementary Therapies Editorial Board. PDQ Prostate Cancer, Nutrition, and Dietary Supplements. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/about-cancer/treatment/cam/patient/prostate-supplements-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389501]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use in the PDQ summaries only. If you want to use an image from a PDQ summary and you are not using the whole summary, you must get permission from the owner. It cannot be given by the National Cancer Institute. Information about using the images in this summary, along with many other images related to cancer can be found in Visuals Online (https://visualsonline.cancer.gov/). Visuals Online is a collection of more than 3,000 scientific images.

### Disclaimer

The information in these summaries should not be used to make decisions about insurance reimbursement. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s E-mail Us (https://www.cancer.gov/contact/email-us).

## General CAM Information

Complementary and alternative medicine (CAM)—also called integrative medicine—includes a broad range of healing philosophies, approaches, and therapies. A therapy is generally called complementary when it is used in addition to conventional treatments; it is often called alternative when it is used instead of conventional treatment. (Conventional treatments are those that are widely accepted and practiced by the mainstream medical community.) Depending on how they are used, some therapies can be considered either complementary or alternative. Complementary and alternative therapies are used in an effort to prevent illness, reduce stress, prevent or reduce side effects and symptoms, or control or cure disease.

Unlike conventional treatments for cancer, complementary and alternative therapies are often not covered by insurance companies. Patients should check with their insurance provider to find out about coverage for complementary and alternative therapies.

Cancer patients considering complementary and alternative therapies should discuss this decision with their doctor, nurse, or pharmacist as they would any type of treatment. Some complementary and alternative therapies may affect their standard treatment or may be harmful when used with conventional treatment.

## Evaluation of CAM Therapies

It is important that the same scientific methods used to test conventional therapies are used to test CAM therapies. The National Cancer Institute and the National Center for Complementary and Integrative Health (NCCIH) are sponsoring a number of clinical trials (research studies) at medical centers to test CAM therapies for use in cancer.

Conventional approaches to cancer treatment have generally been studied for safety and effectiveness through a scientific process that includes clinical trials with large numbers of patients. Less is known about the safety and effectiveness of complementary and alternative methods. Few CAM therapies have been tested using demanding scientific methods. A small number of CAM therapies that were thought to be purely alternative approaches are now being used in cancer treatment—not as cures, but as complementary therapies that may help patients feel better and recover faster. One example is acupuncture. According to a panel of experts at a National Institutes of Health (NIH) meeting in November 1997, acupuncture has been found to help control nausea and vomiting caused by chemotherapy and pain related to surgery. However, some approaches, such as the use of laetrile, have been studied and found not to work and to possibly cause harm.

The NCI Best Case Series Program (https://cam.cancer.gov/indentifying_novel_cam_therapies/best_case_series_program.htm) which was started in 1991, is one way CAM approaches that are being used in practice are being studied. The program is overseen by the NCI’s Office of Cancer Complementary and Alternative Medicine (OCCAM). Health care professionals who offer alternative cancer therapies submit their patients’ medical records and related materials to OCCAM. OCCAM carefully reviews these materials to see if any seem worth further research.

## Questions to Ask Your Health Care Provider About CAM

When considering complementary and alternative therapies, patients should ask their health care provider the following questions:

- What side effects can be expected?
- What are the risks related to this therapy?
- What benefits can be expected from this therapy?
- Do the known benefits outweigh the risks?
- Will the therapy affect conventional treatment?
- Is this therapy part of a clinical trial?
- If so, who is the sponsor of the trial?
- Will the therapy be covered by health insurance?

## To Learn More About CAM

National Center for Complementary and Integrative Health (NCCIH)

The National Center for Complementary and Integrative Health (NCCIH) at the National Institutes of Health (NIH) facilitates research and evaluation of complementary and alternative practices, and provides information about a variety of approaches to health professionals and the public.

- NCCIH Clearinghouse
- Post Office Box 7923 Gaithersburg, MD 20898–7923
- Telephone: 1-888-644-6226 (toll free)
- TTY (for deaf and hard of hearing callers): 1-866-464-3615
- E-mail: info@nccih.nih.gov
- Website: https://nccih.nih.gov

CAM on PubMed

NCCIH and the NIH National Library of Medicine (NLM) jointly developed CAM on PubMed (https://nccih.nih.gov/research/camonpubmed), a free and easy-to-use search tool for finding CAM-related journal citations. As a subset of the NLM's PubMed bibliographic database, CAM on PubMed features more than 230,000 references and abstracts for CAM-related articles from scientific journals. This database also provides links to the websites of over 1,800 journals, allowing users to view full-text articles. (A subscription or other fee may be required to access full-text articles.)

Office of Cancer Complementary and Alternative Medicine

The NCI Office of Cancer Complementary and Alternative Medicine (OCCAM) coordinates the activities of the NCI in the area of complementary and alternative medicine (CAM). OCCAM supports CAM cancer research and provides information about cancer-related CAM to health providers and the general public via the NCI website (https://www.cancer.gov/).

National Cancer Institute (NCI) Cancer Information Service

U.S. residents may call the Cancer Information Service (https://www.cancer.gov/contact/contact-center) (CIS), NCI's contact center, toll free at 1-800-4-CANCER (1-800-422-6237) Monday through Friday from 9:00 am to 9:00 pm. A trained Cancer Information Specialist is available to answer your questions.

Food and Drug Administration

The Food and Drug Administration (FDA) regulates drugs and medical devices to ensure that they are safe and effective.

- Food and Drug Administration
- 10903 New Hampshire Avenue
- Silver Spring, MD 20993
- Telephone: 1-888-463-6332 (toll free)
- Website: http://www.fda.gov

Federal Trade Commission

The Federal Trade Commission (FTC) enforces consumer protection laws. Publications available from the FTC include:

- Who Cares: Sources of Information About Health Care Products and Services
- Fraudulent Health Claims: Don’t Be Fooled

- Consumer Response Center
- Federal Trade Commission
- 600 Pennsylvania Avenue, NW
- Washington, DC 20580
- Telephone: 1-877-FTC-HELP (1-877-382-4357) (toll free)
- TTY (for deaf and hard of hearing callers): 202-326-2502
- Website: http://www.ftc.gov